# Planning the Transition to End-of-Life Care in Advanced Cancer (PDQ®)

Patient Version

This PDQ cancer information summary has current information about planning for end-of-life care in advanced cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Overview

When you learn you have advanced cancer, you’re faced with many decisions about your end-of-life care. Talking about these decisions early can make it easier on you and your family later. The following are some questions you may want to think about:

- What’s important to you during this time?
- Is it most important that you be as comfortable and alert as possible during the last stages of cancer?
- Is it most important to continue with treatments that may help you live longer but make you uncomfortable?

Some patients choose to receive all possible treatments. Others choose to receive only some treatments or no treatment at all. Some choose to receive only care that will keep them comfortable. Having information about your options will help you make these choices. Together, you, your family, and your doctor can decide on a plan for your care during the advanced stages of cancer.

## Quality Care at the End of Life

Key Points for This Section
- You decide what quality care at the end of life means for you.
- Make end-of-life care decisions early.

### You decide what quality care at the end of life means for you.

Your care continues even after all treatments have stopped. End-of-life care is more than what happens moments before dying. Care is needed in the days, weeks, and sometimes even months before death. During this time, many patients feel it's important to:

- Have their pain and symptoms controlled.
- Avoid a long process of dying.
- Feel a sense of control over what is happening to them.
- Cause less emotional and financial burden on the family.
- Become closer with loved ones.

Your doctors and family need to know the kind of end-of-life care you want.

### Make end-of-life care decisions early.

You may be able to think about your options more clearly if you talk about them before the decisions need to be made. It's a good idea to let your doctors, family, and caregivers know your wishes before there is an emergency.

## End-of-Life Care Decisions To Be Made

Key Points for This Section
- Care decisions for the last stages of cancer can be about treatments and procedures, pain control, place of care, and spiritual issues.
  - Chemotherapy
  - Pain and symptom control
  - Cardiopulmonary resuscitation (CPR)
  - Ventilator use
  - Religious and spiritual support

### Care decisions for the last stages of cancer can be about treatments and procedures, pain control, place of care, and spiritual issues.

#### Chemotherapy

Some patients choose to begin new chemotherapy treatment in the end stages of cancer. Others wish to let the disease take its course when a cure is not expected. In the end stages of cancer, chemotherapy usually doesn't help you live longer and it may lower the quality of the time that remains. Each person and each cancer is different. Talking with your doctor about the effects of treatment and your quality of life can help you make a decision. You can ask if the treatment will make you comfortable or if it will help you live longer.

#### Pain and symptom control

Controlling pain and other symptoms can help you have a better quality of life in the end stages of cancer. Pain and symptom control can be part of your care in any place of care, such as the hospital, home, and hospice.

#### Cardiopulmonary resuscitation (CPR)

It's important to decide if you will want to have cardiopulmonary resuscitation (CPR). CPR is a procedure used to try to restart the heart and breathing when it stops. In advanced cancer, the heart, lungs, and other organs begin to fail and it's harder to restart them with CPR. Your doctor can help you understand how CPR works and talk with you about whether CPR is likely to work for you.

People who are near the end of life may choose not to have CPR done. Your decision about having CPR is personal. Your own spiritual or religious views about death and dying may help you decide. If you decide you don’t want CPR, you can ask your doctor to write a do-not-resuscitate (DNR) order. This tells other health care professionals not to perform CPR if your heart or breathing stops. You can remove the DNR order at any time.

Talk with your doctors and other caregivers about CPR as early as possible (for example, when being admitted to the hospital), in case you’re not able to make the decision later. If you do choose to have your doctor write a DNR, it’s important to tell all your family members and caregivers about it.

In the United States, if there is no DNR order, you will be given CPR to keep you alive.

#### Ventilator use

A ventilator is a machine used to help you breathe and keep you alive after normal breathing stops. It doesn't treat a disease or condition. It's used only for life support. You can tell doctors whether you would want to be put on a ventilator if your lungs stop working or if you cannot breathe on your own after CPR. If your goal of care is to live longer, you may choose to have a ventilator used. Or you may choose to have a ventilator for only a certain length of time. It's important to tell your family and health care providers what you want before you have trouble breathing. For more information, see the section on ventilator use in the PDQ summary on Last Days of Life.

#### Religious and spiritual support

Your religious or spiritual beliefs may help you with end-of-life decisions. Clergy and chaplains can give counseling. You can also talk with a member of your church, a social worker, or even other people who have cancer.

## Talking with Your Doctor About End-of-Life Care

Key Points for This Section
- You may need to start the conversation.
- Prognosis, treatment goals, and making decisions are some of the end-of-life issues to discuss with your doctor.
- Early communication with your doctors can help you feel more prepared for end-of-life issues.
- There are ways to improve communication with your doctors.

### You may need to start the conversation.

Some doctors don't ask patients about end-of-life issues. If you want to make choices about these issues, talk with your doctors so that your wishes can be carried out. Open communication can help you and your doctors make decisions together and create a plan of care that meets your goals and wishes. If your doctor is not comfortable talking about end-of-life plans, you can talk to other specialists for help. (See the PDQ summary on Communication in Cancer Care.)

### Prognosis, treatment goals, and making decisions are some of the end-of-life issues to discuss with your doctor.

- Understand your prognosis
  Having a good understanding of your prognosis is important when making decisions about your care and treatment during advanced cancer. You will probably want to know how long you have to live. That's a hard question for doctors to answer. It can be different for each person and depends on the type of cancer, where it has spread, and whether you have other illnesses. Treatments can work differently for each person. Your doctor can talk about the treatment options with you and your family and explain the effects they may have on your cancer and your quality of life. Knowing the benefits and risks of available treatments can help you decide on your goals of care for the last stages of the cancer.
- Decide on your care goals
  Your care goals for advanced cancer depend in part on whether quality of life or length of life is more important to you. Your goals of care may change as your condition changes or if new treatments become available. Tell your doctor what your goals of care are, even if you aren't asked. It's important that you and your doctor are working toward the same goals.
- Take part in making decisions
  Do you want to take part in making the decisions about your care? Or would you rather have your family and your doctors make those decisions? This is a personal choice and your family and doctors need to know what you want.

### Early communication with your doctors can help you feel more prepared for end-of-life issues.

Many patients who start talking with their doctors early about end-of-life issues report feeling better prepared. Better communication with your doctors may make it easier to deal with concerns about being older, living alone, relieving symptoms, spiritual well-being, and how your family will cope in the future.

### There are ways to improve communication with your doctors.

Tell your doctor how you and your family wish to receive information and the type of information you want. Also ask how you can get information at times when you can't meet face-to-face.

Remembering what your doctor said and even remembering what you want to ask can be hard to do. Some of the following may help communication and help you remember what was said:

- Have a family member go with you when you meet with your doctor.
- Make a list of the questions you want to ask the doctor during your visit.
- Get the information in writing.
- Record the discussion with tape recorders, smart phones, or on video.
- Ask if your doctor or clinic offers any of the following:
  - A cancer consultation preparation package, which includes aids such as a question idea sheet, booklets on decision making and patient rights, and information about the clinic.
  - A talk with a psychologist about advance planning and end-of-life issues.
  - An end-of-life preference interview, which includes a list of questions that can help you explain your wishes about the end of life.

## Supportive Care, Palliative Care, and Hospice

Key Points for This Section
- Even when treatments can no longer cure the cancer, medical care is still needed.
  - Supportive care
  - Palliative care
  - Hospice care

### Even when treatments can no longer cure the cancer, medical care is still needed.

Some of the end-of-life care options are supportive care, palliative care, and hospice.

#### Supportive care

Supportive care is given to prevent or treat, as early as possible, the symptoms of the cancer, side effects caused by treatments, and psychological, social, and spiritual problems related to the cancer or its treatment. During active treatment to cure the cancer, supportive care helps you stay healthy and comfortable enough to continue receiving the cancer treatments. In the last stages of cancer, when a cure is no longer the goal, supportive care is used for side effects that continue.

#### Palliative care

Palliative care is specialized medical care for people with serious or life-threatening illnesses. The focus of palliative care is relief from pain and other symptoms, both during active treatment and when treatment has been stopped. Palliative care is offered in some hospitals, outpatient centers, and in the home.

Palliative care helps to improve your quality of life by preventing and relieving suffering. When you're more comfortable, your family's quality of life may also be better. Palliative care includes treating physical symptoms such as pain, and helping you and your family with emotional, social, and spiritual concerns. When palliative treatment is given at the end of life, the focus is on relieving symptoms and distress caused by the process of dying and to make sure your goals of care are followed.

#### Hospice care

When treatment is no longer helping, you may choose hospice. Hospice is a program that gives care to people who are near the end of life and have stopped treatment to cure or control their cancer. Hospice care focuses on quality of life rather than length of life. The hospice team offers physical, emotional, and spiritual support for patients who are expected to live no longer than six months. The goal of hospice is to help patients live each day to the fullest by making them comfortable and relieving their symptoms. This may include supportive and palliative care to control pain and other symptoms so you can be as alert and comfortable as possible. Services to help with the emotional, social, and spiritual needs of you and your family are also an important part of hospice care.

Hospice programs are designed to keep the patient at home with family and friends, but hospice care may also be given in hospice centers and in some hospitals and nursing homes. The hospice team includes doctors, nurses, spiritual advisors, social workers, nutritionists, and volunteers. Team members are specially trained on issues that occur at the end of life. The hospice program continues to give help, including grief counseling, to the family after their loved one dies. Ask your doctor for information if you wish to receive hospice care.

## Advance Planning

Key Points for This Section
- Making end-of-life care decisions early can ease your mind and decrease stress on your family.
- Advance directives are documents that state what your wishes are for certain medical treatments when you can no longer communicate those wishes.
- All your caregivers need to have copies of your advance directives.
- You can change or cancel an advance directive at any time.

### Making end-of-life care decisions early can ease your mind and decrease stress on your family.

There may come a time when you can't tell the health care team what you want. When that happens, would you prefer to have your doctor and family make decisions? Or would you rather make decisions early, so your wishes will be known and can be followed when the time comes? If not planned far ahead of time, the end-of-life decisions must be made by someone other than you.

Planning ahead for end-of-life care helps with the following:

- Makes sure your doctors and family know what your wishes are.
- Allows you to refuse the use of treatments.
- Decreases the emotional stress on your family, who would have to make decisions if you aren't able to.
- Reduces the cost of care, if you choose not to receive life-saving procedures.
- Eases your mind to have these decisions already made.

You can make your wishes known with an advance directive.

### Advance directives are documents that state what your wishes are for certain medical treatments when you can no longer communicate those wishes.

Advance directive is the general term for different types of documents that state what your wishes are for certain medical treatments when you can no longer tell those wishes to your caregivers. In addition to decisions about relieving symptoms at the end of life, it is also helpful to decide if and when you want certain treatments to stop. Advance directives make sure your wishes about treatments and life-saving procedures to keep you alive are known ahead of time. Without knowing your wishes, doctors will do everything medically possible to keep you alive, such as cardiopulmonary resuscitation (CPR) and the use of a ventilator (breathing machine).

Each state has its own laws for advance directives. Make sure your advance directives follow the laws of the state where you live and are being treated. State-specific advance directives can be downloaded from the Caring Connections (http://www.caringinfo.org/i4a/pages/index.cfm?pageid=3289) section of the National Hospice and Palliative Care Organization website (http://www.nhpco.org/advance-care-planning).

The following are types of documents that communicate your wishes in advance:

- Living will: A legal document that states whether you want certain life-saving medical treatments to be used or not used under certain circumstances. Some of the treatments covered by a living will include CPR, use of a ventilator (breathing machine), and tube-feeding.
- Health care proxy (HCP): A document in which you choose a person (called a proxy) to make medical decisions if you become unable to do so. It's important that your proxy knows your values and wishes, so that he or she can make the decisions you would make if you were able. You do not have to state specific decisions about individual treatments in the document, just state that the proxy will make medical decisions for you. HCP is also known as durable power of attorney for health care (DPOAHC) or medical power of attorney (MPOA).
- Do-Not-Resuscitate (DNR) order: A document that tells medical staff in the hospital not to do cardiopulmonary resuscitation (CPR) if your heart or breathing stops. (See the Cardiopulmonary resuscitation (CPR) section, above, for more information.) A DNR order is a decision only about CPR. It does not affect other treatments that may be used to keep you alive, such as medicine or food.
- Out-of-hospital DNR order: A document that tells emergency medical workers outside of a hospital that you do not wish to have CPR or other types of resuscitation. Each state has its own rules for a legal out-of-hospital DNR order, but it is usually signed by the patient, a witness, and the doctor. It's best to have several copies so one can quickly be given to emergency medical workers when needed.
- Do-Not-Intubate (DNI) order: A document that tells medical staff in a hospital or nursing facility that you do not wish to have a breathing tube inserted and to be put on a ventilator (breathing machine).
- Physician Orders for Life-Sustaining Treatment (POLST): A form that states what kind of medical treatment you want toward the end of your life. It is signed by you and your doctor.
- Medical Orders for Life-Sustaining Treatment (MOLST): A form that states the care you would like to receive if you are not able to communicate. This care includes CPR, intubation (breathing tubes), and other life-saving procedures. Under current law, the information in a MOLST form must be followed both in the home and hospital by all medical staff, including emergency medical workers.

### All your caregivers need to have copies of your advance directives.

Give copies of your advance directives to your doctors, caregivers, and family members. Advance directives need to move with you. If your doctors or your place of care changes, copies of your advance directives need to be given to your new caregivers. This will make sure that your wishes are known through all cancer stages and places of care.

### You can change or cancel an advance directive at any time.

## The Transition to End-of-Life Care

The word transition can mean a passage from one place to another. The transition or change from looking toward recovery to receiving end-of-life care is not an easy one and there are important decisions to be made. If you become too sick before you have made your wishes known, others will make care and treatment decisions for you, without knowing what you would have wanted. It may be less stressful for everyone if you, your family, and your health care providers have planned ahead for this time.

The goal of end-of-life care is to prevent suffering and relieve symptoms. The right time to transition to end-of-life care is when this supports your changing condition and changing goals of care.

There are certain times when you may think about stopping treatment and transitioning to comfort care. These include:

- Finding out that the cancer is not responding to treatment and that more treatment is not likely to help.
- Having poor quality of life due to the side effects or complications of treatment.
- Being unable to carry out daily activities when the disease progresses.

Together with your doctor, you and your family members can share an understanding about treatment choices and when transition to end-of-life care is the best choice. When you make the decisions and plans, doctors and family members can be sure they are doing what you want.

For more information about the end of life, see the PDQ summary on Last Days of Life.

## To Learn More About Planning for End-of-Life Care

- Choices for Care When Treatment May Not Be an Option (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices)
- Planning for Advanced Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/planning)
- End-of-Life Care for People Who Have Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/care-fact-sheet)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about planning for end-of-life care in advanced cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Planning the Transition to End-of-Life Care in Advanced Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/advanced-cancer/planning/end-of-life-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389514]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).